# Nausea and Vomiting Related to Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of nausea and vomiting (emesis) (N&V). It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## What are nausea and vomiting?

Nausea is when you feel sick to your stomach, as if you have the urge to throw up. Vomiting is when you throw up. Nausea and vomiting are common side effects of cancer treatments, including chemotherapy (chemo) and radiation therapy, but antinausea medicines often prevent or relieve nausea and vomiting before they start or become a problem.

If uncontrolled, vomiting can lead to serious health problems such as dehydration, electrolyte imbalances, and weight loss. Before you begin treatment, your doctor may suggest medications and tips to prevent and control these side effects.

Nausea and vomiting can occur at different times during cancer treatment:

- Acute nausea and vomiting happen within 24 hours after treatment starts.
- Delayed nausea and vomiting happen 1 to 7 days after treatment. This is also called late nausea and vomiting.
- Anticipatory nausea and vomiting happen before treatment begins. If you have had nausea and vomiting after an earlier treatment session, the smells, sights, and sounds of the treatment room during a later session may trigger nausea and vomiting before the session begins.
- Chronic nausea and vomiting are ongoing after treatment ends.

Nausea and vomiting may also be described based on how well antinausea medicines work against them:

- Breakthrough nausea and vomiting happen within 5 days of starting antinausea treatment.
- Refractory nausea and vomiting do not get better with antinausea medications.

### What causes nausea and vomiting in people with cancer?

Cancer and cancer treatments can cause nausea and vomiting. Other causes include anxiety, pain medicines, taking certain medications on an empty stomach, and other medical conditions.

#### Nausea and vomiting from cancer

Nausea and vomiting may be a sign or symptom of some types and stages of cancer:

- cancers in the abdomen
- brain and central nervous system cancers
- advanced cancer
- cancer that has spread to the bones

#### Nausea and vomiting from cancer treatments

Many cancer treatments cause nausea and vomiting, but antinausea medicines (also known as antiemetics) given before treatment sessions work well to prevent or reduce these side effects.

- Chemotherapy often causes nausea and vomiting. Nausea and vomiting from chemo may begin a few minutes to a few hours after treatment begins or be delayed and occur a day or more after treatment. Nausea and vomiting from chemotherapy usually last 24 to 48 hours, but some people may feel sick for up to 7 days after treatment. You will usually receive antinausea medicines before chemotherapy starts because once nausea and vomiting from chemotherapy develop, they are more difficult to treat.
- Radiation therapy can cause nausea and vomiting, especially when radiation is directed at the brain, upper abdomen, or whole body. People receiving higher doses of radiation may be more likely to experience these side effects. You may begin feeling sick a few hours after each treatment session, and nausea and vomiting may last for three to four weeks.
- Targeted therapy and immunotherapy drugs can bring on nausea and vomiting. You may start to feel sick during treatment or after it has ended. As with chemotherapy, it's important to prevent nausea and vomiting by taking antinausea medicines before treatment starts.
- Bone marrow or stem cell transplant can cause nausea and vomiting because you will receive large amounts of chemo, radiation, or both before a transplant. Nausea and vomiting can also be signs of graft-versus-host disease or infection, which are possible complications of bone marrow transplants.
- Surgery may lead to nausea and vomiting caused by side effects of anesthesia and pain medicines given after surgery. Nausea and vomiting after surgery may last 24 to 48 hours.

### How to prevent and stop nausea and vomiting

#### Medicines for nausea and vomiting

Medicines called antiemetics (or antinausea drugs) work well to prevent and relieve nausea and vomiting in people with cancer. Your doctor may prescribe multiple types of antiemetics you can take depending on the severity of your nausea and vomiting. Your doctor will also tell you when to take the antiemetics, such as before or after chemotherapy treatments or a certain amount of time before eating.

Many types of antiemetics can prevent or help you get relief from nausea and vomiting, and you may be prescribed these or others that are not listed:

- drugs that block serotonin, a chemical in the brain that can trigger nausea and vomiting: ondansetron (https://www.cancer.gov/about-cancer/treatment/drugs/ondansetronhydrochloride) (Zofran), granisetron (https://www.cancer.gov/about-cancer/treatment/drugs/granisetron) (Kytril), dolasetron (Anzemet), palonosetron (https://www.cancer.gov/about-cancer/treatment/drugs/palonosetronhydrochloride) (Aloxi)
- drugs that block dopamine, a chemical in the brain that can trigger nausea and vomiting: chlorpromazine, prochlorperazine (Compazine), promethazine (Phenergan), metoclopramide (Reglan)
- drugs that block the NK-1 receptor, a protein in the brain that can trigger nausea and vomiting: aprepitant (https://www.cancer.gov/about-cancer/treatment/drugs/aprepitant) or fosaprepitant (Emend)
- steroids: dexamethasone (https://www.cancer.gov/about-cancer/treatment/drugs/dexamethasone) (Decadron), methylprednisolone (Medrol)
- benzodiazepines, which can prevent anxiety-related nausea and vomiting: alprazolam (Xanax), lorazepam (Ativan)
- antipsychotics, which block multiple areas in the brain that can cause nausea and vomiting: olanzapine (Zyprexa)
- cannabinoids, which contain THC and can help relieve nausea and vomiting: dronabinol (Marinol)

#### Tips for managing nausea and vomiting

In addition to prescribing antinausea medicines, your doctor may suggest tips for managing nausea and vomiting. These tips may sometimes be called natural nausea relief.

- Drink plenty of fluids. Drinking water or clear liquids will help prevent dehydration, a serious problem that happens when your body loses too much fluid from vomiting and you are not drinking enough. Try to sip on water, broth, fruit juices, ginger ale, tea, and/or sports drinks throughout the day. If you are losing weight without trying, drink fluids with calories instead of water.
- Eat foods that are easy on your stomach. Try cold foods such as popsicles, pudding, yogurt, and gelatin. Try bland, starchy foods such as toast, rice, plain pasta, crackers, and pretzels. Foods and beverages with ginger, such as ginger ale and ginger tea, may also ease nausea and vomiting. Learn more about eating tips to help you avoid nausea and vomiting while you are undergoing cancer treatment at Nutrition During Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nutrition).
- Avoid certain foods. Don’t eat greasy, fried, sweet, or spicy foods if you feel sick after eating them.
- Avoid strong odors when eating. Foods with strong odors you may want to avoid include coffee, fish, onions, and garlic. If the smell of food bothers you, ask others to make your food. Eating in a well-ventilated room free of strong food smells, perfume, or scented candles may also help.
- Eat smaller meals more frequently throughout the day. Try to eat five to six small meals rather than three larger meals.
- Eat in a peaceful, relaxing space. After eating, try resting while seated upright or lying down with your head elevated for 30 minutes to help reduce nausea and vomiting.
- Keep a record of when you feel nauseous and what you did or ate before that. This can help your doctor or nurse figure out what brings on nausea and vomiting.
- Practice relaxation techniques. Deep breathing, guided imagery, hypnosis, massages, listening to music, and meditating can all help reduce nausea and vomiting in people with cancer. Ask your nurse about programs that may be available in your community or at the hospital where you are receiving treatment.
- Ask your doctor about acupuncture and acupressure. Acupuncture uses needles to stimulate certain points in the body that can help relieve symptoms and must be done by a professional acupuncturist. You can do acupressure on yourself by finding a specific point in your wrist and applying pressure. You can also wear Sea-Band wristbands, which stimulate acupressure points, and may help relieve nausea.
  Acupressure can help relieve nausea when used together with medication. One easy-to-find acupressure point is on your wrist. Before trying acupressure, ask your doctor if it's safe for you.
  Acupressure; drawing showing the location of an acupressure point on the wrist and how to find it. The drawing on the left shows a person's arm with the palm of their hand facing up. The first three fingers of the person's other hand are placed just below the palm. There is also an acupressure point (shown as a red, circular dot) on the inner part of the wrist just below the three fingers. The drawing on the right shows the person's thumb placed directly on the acupressure point. Firm pressure is applied in a circular motion to this point.

If you want to try supplements or complementary and alternative medicines to ease nausea and vomiting, always check with your doctor first. Some supplements and alternative therapies may cause cancer treatments to work less well.

#### How a caregiver can help

- Make meals for the person you are caring for if they are feeling nauseous or if the smell of food makes their symptoms worse. Be sure the kitchen is ventilated to decrease food smells.
- Have the person eat with plastic utensils instead of metal ones, which can taste bitter. Finger foods are also an option.
- Ask the person’s doctor about medicines that can help reduce or prevent nausea and vomiting.
- Help the person you are caring for take their antinausea medicine at the right times. For example, the doctor may recommend some medicines be taken before or after treatment or a certain amount of time before a meal.
- Monitor the person for dizziness, weakness, or confusion, which are all signs of dehydration.
- Encourage the person to sip clear liquids slowly throughout the day to avoid constipation and dehydration, which can worsen nausea and vomiting.

### Nausea and vomiting in children being treated for cancer

Nausea and vomiting are serious side effects of cancer treatment for children. You can learn about how to help your child avoid nausea and vomiting during cancer treatment in our booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents) in the section Common Health Problems.

Nausea and vomiting in children can be treated with many of the same medicines and techniques (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting#how-to-prevent-and-stop-nausea-and-vomiting) used in adults. But not all medicines for adults are safe for children to take, and children are often given lower doses.

Doctors have also found that several integrative therapies may be especially effective for treating nausea and vomiting in children:

- hypnosis and guided imagery
- music therapy
- support groups
- virtual reality games

#### Be aware of delayed nausea and vomiting in children being treated for cancer

Delayed nausea, or nausea and vomiting that happens more than 24 hours after a cancer treatment, may be more difficult to notice in children than in adults. A change in the child’s eating pattern may be the only sign of a problem. In addition, most chemotherapy treatments for children are scheduled over several days. This makes the timing and risk of delayed nausea difficult to predict.

Talk with your child’s health care team if your child has nausea or vomiting or if you notice a sudden change in their eating habits. Your child’s doctors can help you determine if these changes are related to the cancer treatment and identify strategies to help manage them.

### Talking with your doctor about nausea and vomiting

If you are experiencing nausea and vomiting or are worried about having these side effects, tell your health care team. They can help you find ways to get relief or prevent nausea and vomiting before it starts.

Questions to ask your provider about nausea and vomiting:

- What symptoms or problems should I call you about?
- What medicine could help me? When should I take this medicine?
- How much liquid should I drink each day? What should I do if I throw up?
- What foods would be easy on my stomach? What foods should I avoid?
- How can I meet with a registered dietitian to learn more?
- What specialists could I see to learn about acupuncture and other natural treatments that could improve my symptoms?

### Getting support if you have nausea and vomiting

Side effects like nausea and vomiting can be hard to deal with, both physically and emotionally. It’s important to ask for support from your health care team. They can help you prepare for and make it through difficult times. Learn more about ways to cope with cancer (https://www.cancer.gov/about-cancer/coping).

For family members and friends who are caring for someone with cancer, you may find these suggestions for caregivers to be helpful (https://www.cancer.gov/about-cancer/coping/caregiver-support).

Listen to tips on how to manage nausea and vomiting caused by cancer treatments such as radiation therapy (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting/radiationtherapy-06-nausea-and-vomiting.mp3). (Type: MP3 | Time: 2:18 | Size: 2.2MB)

### Related Resources

- Nausea and Vomiting Related to Cancer Treatment (PDQ®)–Health Professional Version
- Complementary and Alternative Medicine for Patients (https://www.cancer.gov/about-cancer/treatment/cam/patient)
- Olanzapine Helps Prevent Nausea and Vomiting Caused by Chemotherapy (https://www.cancer.gov/news-events/cancer-currents-blog/2016/olanzapine-chemotherapy-nausea)
- Olanzapine Reduces Nausea and Vomiting Caused by Advanced Cancer (https://www.cancer.gov/news-events/cancer-currents-blog/2020/olanzapine-reduces-nausea-advanced-cancer)